# Gastric Adenocarcinoma and Proximal Polyposis of the Stomach (GAPPS) (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS). It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction to Gastric Adenocarcinoma and Proximal Polyposis of the Stomach (GAPPS)

Gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS) is an autosomal dominant syndrome caused by germline pathogenic variants in promoter 1B of the APC gene.[1,2] Of note, large deletions involving promoter 1B of the APC gene are associated with a different syndrome called familial adenomatous polyposis (FAP).[3,4] GAPPS was first described in 2012.[2] This syndrome is characterized by numerous stomach polyps (predominantly fundic gland polyps in the body and fundus of the stomach, sparing the antrum), with regions of dysplasia.[2,5] GAPPS is not typically associated with colorectal polyposis. The risk of intestinal-type gastric adenocarcinoma appears to be significantly elevated in GAPPS, but the exact risk of this is currently unknown.

GAPPS and FAP are both caused by pathogenic or likely pathogenic variants in the APC gene, but they are distinct syndromes with different clinical characteristics. In GAPPS, polyposis and cancer risk are primarily confined to the stomach, while in FAP, polyposis and cancer risk are elevated in the colon. FAP is a hereditary cancer syndrome characterized by colorectal polyposis and a 93% risk of colorectal adenocarcinoma. Pathogenic or likely pathogenic variants in promoter 1B of the APC gene are pathognomonic of GAPPS and do not lead to FAP. In contrast, FAP is caused by germline pathogenic variants elsewhere in the APC gene or large deletions in promoter 1B. For more information about FAP, refer to the FAP section in Genetics of Colorectal Cancer.

Environmental risk factors have not been reported to cause or modify the penetrance of GAPPS. Although studies have speculated that there is an inverse relationship between gastric neoplasia and Helicobacter pylori infection, further research is warranted to clarify how H. pylori impacts gastric neoplasia in individuals with GAPPS.[6]

### References

Li J, Woods SL, Healey S, et al.: Point Mutations in Exon 1B of APC Reveal Gastric Adenocarcinoma and Proximal Polyposis of the Stomach as a Familial Adenomatous Polyposis Variant. Am J Hum Genet 98 (5): 830-842, 2016.27087319
Worthley DL, Phillips KD, Wayte N, et al.: Gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS): a new autosomal dominant syndrome. Gut 61 (5): 774-9, 2012.21813476
Lin Y, Lin S, Baxter MD, et al.: Novel APC promoter and exon 1B deletion and allelic silencing in three mutation-negative classic familial adenomatous polyposis families. Genome Med 7 (1): 42, 2015.25941542
Snow AK, Tuohy TM, Sargent NR, et al.: APC promoter 1B deletion in seven American families with familial adenomatous polyposis. Clin Genet 88 (4): 360-5, 2015.25243319
Yanaru-Fujisawa R, Nakamura S, Moriyama T, et al.: Familial fundic gland polyposis with gastric cancer. Gut 61 (7): 1103-4, 2012.22027476
Tacheci I, Repak R, Podhola M, et al.: Gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS) - A Helicobacter-opposite point. Best Pract Res Clin Gastroenterol 50-51: 101728, 2021.33975682

## Genetics of GAPPS

Gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS) is caused by germline pathogenic variants in promoter 1B (regulatory region) of the APC tumor suppressor gene.[1] Of note, large deletions involving promoter 1B result in a familial adenomatous polyposis (FAP) phenotype. For more information, see the FAP section in Genetics of Colorectal Cancer.[2,3]

The APC gene is located on chromosome 5q21 and encodes a 2,843–amino acid protein that is important for cell adhesion and signal transduction processes.[4,5] The APC protein regulates intracellular concentrations of beta-catenin, a major mediator of the Wnt signal transduction pathway.[6] For more information about the APC gene, see the Genetics of FAP section in Genetics of Colorectal Cancer.

A 2016 study identified that germline pathogenic variants in promoter 1B of the APC gene cause GAPPS.[1] The study included six families who all previously tested negative for germline pathogenic variants in APC. However, regulatory regions in APC, like promoter 1B, were not included in their original testing.[1,7] Whole genome sequencing was also performed in these families, and it failed to identify novel or rare genetic variants that cosegregated with GAPPS. After a loss of heterozygosity was identified in fundic gland polyps on chromosome 5 in a 46-Mb region containing the APC gene, the researchers pursued Sanger sequencing of the APC gene's promoter 1A and promoter 1B in family members affected with GAPPS.[1] Sanger sequencing identified several pathogenic variants in the promoter 1B region of APC, including APC c.-191T>C variants in four families with GAPPS, an APC c.-192A>G variant in one family with GAPPS, and an APC c.-195A>C variant in one family with GAPPS. These APC pathogenic variants reside within the Ying Yang 1 binding motif of promoter 1B, and hence, reduce transcriptional activity of APC. The study also reported that a second somatic hit in APC occurred in most fundic gland polyps in relatives with GAPPS, either via loss of the wild-type allele or acquisition of protein-truncating variants.

Since GAPPS was first described in the literature, over 20 families with the syndrome have been identified in Australia, North America, Europe, and Japan.[1,7-12] However, the population prevalence and geographic distribution of GAPPS is elusive. This phenomenon may be due to the following: 1) disparate access to diagnostic screening modalities that can identify gastric lesions, and 2) few laboratories offer sequencing analysis of APC's promoter 1B.[13,14]

### References

Li J, Woods SL, Healey S, et al.: Point Mutations in Exon 1B of APC Reveal Gastric Adenocarcinoma and Proximal Polyposis of the Stomach as a Familial Adenomatous Polyposis Variant. Am J Hum Genet 98 (5): 830-842, 2016.27087319
Lin Y, Lin S, Baxter MD, et al.: Novel APC promoter and exon 1B deletion and allelic silencing in three mutation-negative classic familial adenomatous polyposis families. Genome Med 7 (1): 42, 2015.25941542
Snow AK, Tuohy TM, Sargent NR, et al.: APC promoter 1B deletion in seven American families with familial adenomatous polyposis. Clin Genet 88 (4): 360-5, 2015.25243319
Kinzler KW, Nilbert MC, Su LK, et al.: Identification of FAP locus genes from chromosome 5q21. Science 253 (5020): 661-5, 1991.1651562 91335210
Nishisho I, Nakamura Y, Miyoshi Y, et al.: Mutations of chromosome 5q21 genes in FAP and colorectal cancer patients. Science 253 (5020): 665-9, 1991.1651563
Rubinfeld B, Souza B, Albert I, et al.: Association of the APC gene product with beta-catenin. Science 262 (5140): 1731-4, 1993.8259518
Worthley DL, Phillips KD, Wayte N, et al.: Gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS): a new autosomal dominant syndrome. Gut 61 (5): 774-9, 2012.21813476
Yanaru-Fujisawa R, Nakamura S, Moriyama T, et al.: Familial fundic gland polyposis with gastric cancer. Gut 61 (7): 1103-4, 2012.22027476
Repak R, Kohoutova D, Podhola M, et al.: The first European family with gastric adenocarcinoma and proximal polyposis of the stomach: case report and review of the literature. Gastrointest Endosc 84 (4): 718-25, 2016.27343414
Grossman A, Colavito J, Levine J, et al.: Filling in the "GAPPS": an unusual presentation of a child with gastric adenocarcinoma and proximal polyposis of the stomach. Gastric Cancer 25 (2): 468-472, 2022.34581903
Foretová L, Navrátilová M, Svoboda M, et al.: GAPPS - Gastric Adenocarcinoma and Proximal Polyposis of the Stomach Syndrome in 8 Families Tested at Masaryk Memorial Cancer Institute - Prevention and Prophylactic Gastrectomies. Klin Onkol 32 (Supplementum2): 109-117, 2019.31409086
Iwakawa Y, Yoshikawa K, Okamoto K, et al.: Four cases of gastric adenocarcinoma and proximal polyposis of the stomach treated by robotic total gastrectomy. Surg Case Rep 8 (1): 70, 2022.35435526
Herrero R, Park JY, Forman D: The fight against gastric cancer - the IARC Working Group report. Best Pract Res Clin Gastroenterol 28 (6): 1107-14, 2014.25439075
National Library of Medicine: Genetic Testing Registry. Bethesda, MD: National Library of Medicine. Available online (https://www.ncbi.nlm.nih.gov/gtr/). Last accessed February 23, 2024.

## Genetic Testing for GAPPS

Consensus genetic testing guidelines specific to gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS) do not yet exist. Proposed diagnostic criteria for GAPPS include a heterozygous germline APC pathogenic variant in promoter 1B and all of the following:[1,2]

- More than 100 proximal gastric polyps with antral sparing in the proband or more than 30 gastric polyps in an individual who has a first-degree relative with GAPPS.
- The proband's gastric polyps primarily have fundic gland pathology (some with dysplasia), or the proband has a family member with a history of dysplastic fundic gland polyps or gastric adenocarcinoma.
- Proband does not have a history of duodenal or colorectal polyposis.
- Gastric polyps and gastric adenocarcinoma in the family follow an autosomal dominant inheritance pattern.
- Other causes of gastric polyposis have been ruled out (i.e., other heritable gastric polyposis syndromes and the use of proton pump inhibitors).

However, GAPPS should be suspected in patients with 100 or more proximal gastric polyps with antral sparing, the absence of colorectal polyposis, and the presence of a germline pathogenic variant in the promoter 1B region of the APC gene. Individuals are at the greatest risk for GAPPS if they have a biological relative with clinical features of GAPPS and/or a known germline pathogenic variant in promoter 1B of the APC gene. Clinical-grade, diagnostic genetic testing for GAPPS is available at Clinical Laboratory Improvement Amendments (CLIA)-certified laboratories. Although many laboratories in the United States offer germline APC genetic testing, only a few perform sequence analysis of promoter 1B for the pathogenic variants that cause GAPPS.[3] Therefore, when patients have personal and/or family histories that are suggestive of GAPPS, APC genetic testing must be ordered from one of these laboratories.

Primary differential diagnoses for GAPPS include the following:

- Classic and attenuated familial adenomatous polyposis (FAP). In both classic and attenuated FAP, fundic gland polyps are observed in up to 89% of cases (fundic gland polyps carpet the stomach in 25% of cases).[4,5] The hallmark feature of both classic and attenuated FAP is colonic polyposis followed by duodenal polyposis. In GAPPS, affected individuals notably lack duodenal and colorectal polyposis. For more information, see the Familial Adenomatous Polyposis section in Genetics of Colorectal Cancer.
- MUTYH-associated polyposis (MAP). The gastric manifestations of MAP are attenuated when compared with those associated with FAP. However, more research on MAP-related gastric manifestations is necessary. For more information, see the MUTYH-Associated Polyposis section in Genetics of Colorectal Cancer.
- Proton pump inhibitor–induced gastric polyposis. Sporadic fundic gland polyps can be seen in 3% to 5% of patients in the general population who use proton pump inhibitors.[6-8] These polyps tend to be isolated, are less than 5 mm in size, and do not show signs of dysplasia. For more information, see the Introduction section in Genetics of Gastric Cancer.
- Hamartomatous polyposis syndromes. The hamartomatous polyposis syndromes include PTEN tumor hamartoma syndromes, juvenile polyposis syndrome, and Peutz-Jeghers syndrome. Patients with these syndromes can present with gastric polyposis (including fundic gland polyps), although pathology usually includes hamartomatous polyps as well. Furthermore, gastric polyposis occurs in the antrum —an area of the stomach that is spared in individuals with GAPPS.[1] For more information, see the PTEN hamartoma tumor syndromes (including Cowden syndrome), Peutz-Jeghers syndrome, and Juvenile polyposis syndrome sections in Genetics of Colorectal Cancer.

### References

Rudloff U: Gastric adenocarcinoma and proximal polyposis of the stomach: diagnosis and clinical perspectives. Clin Exp Gastroenterol 11: 447-459, 2018.30584346
Worthley DL, Phillips KD, Wayte N, et al.: Gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS): a new autosomal dominant syndrome. Gut 61 (5): 774-9, 2012.21813476
National Library of Medicine: Genetic Testing Registry. Bethesda, MD: National Library of Medicine. Available online (https://www.ncbi.nlm.nih.gov/gtr/). Last accessed February 23, 2024.
Bianchi LK, Burke CA, Bennett AE, et al.: Fundic gland polyp dysplasia is common in familial adenomatous polyposis. Clin Gastroenterol Hepatol 6 (2): 180-5, 2008.18237868
Mankaney G, Leone P, Cruise M, et al.: Gastric cancer in FAP: a concerning rise in incidence. Fam Cancer 16 (3): 371-376, 2017.28185118
Torbenson M, Lee JH, Cruz-Correa M, et al.: Sporadic fundic gland polyposis: a clinical, histological, and molecular analysis. Mod Pathol 15 (7): 718-23, 2002.12118109
Freeman HJ: Proton pump inhibitors and an emerging epidemic of gastric fundic gland polyposis. World J Gastroenterol 14 (9): 1318-20, 2008.18322941
Huang CZ, Lai RX, Mai L, et al.: Relative risk factors associated with the development of fundic gland polyps. Eur J Gastroenterol Hepatol 26 (11): 1217-21, 2014.25187299

## Clinical Features of GAPPS

### Gastric Manifestations in GAPPS

A key feature of gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS) is extensive fundic gland polyposis in the proximal regions of the stomach with antral (distal) sparing. For more information, see the Gastric polyps section in Genetics of Gastric Cancer.[1] Since GAPPS is rare, literature on this syndrome primarily exists in the form of case reports and case series.[2-6] The incidence of gastric adenocarcinoma (intestinal or mixed types) in patients with GAPPS is 12% to 25% with age of diagnosis ranging from 23 years to 75 years.[5-7] Fundic gland polyposis (which precedes gastric adenocarcinoma) has occurred as early as 8 years in patients with GAPPS.[8] Gastric polyps range in size, with most polyps measuring less than 1 cm.[5-7] However, in GAPPS, gastric polyps can grow up to 4 cm in size. These polyps can be densely packed with extensive carpeting that covers the gastric mucosa without any visible normal mucosa. Most gastric polyps in GAPPS have fundic gland pathology with or without dysplasia. However, other pathologies are also seen, including hyperplastic polyps, adenomas, and hyperproliferative aberrant crypts. In a histological review of 25 patients, 15 patients had abnormal endoscopic biopsies.[6] Of these 15 individuals, 10 had hyperproliferative aberrant crypts, 10 had fundic gland polyps, 6 had gastric adenomas, 1 had an adenoma associated with gastric adenocarcinoma, and 1 had gastric adenocarcinoma. The penetrance of fundic gland polyposis and gastric adenocarcinoma can vary between different families and among family members with the same APC pathogenic variant. In a study of 24 Czech patients from 8 families (all had the same germline c.-191T>C APC promotor 1B variant), some developed gastric polyposis in their 20s while others had not yet developed polyposis at age 65 years.[5] Five individuals in this study developed gastric adenocarcinoma between the ages of 29 years and 64 years.

### Colorectal Manifestations in GAPPS

Individuals with GAPPS may also have a propensity to develop colon polyps, although polyps are not thought to develop at an earlier age than those seen in the general population.[7,9] It has been postulated that APC's promoter 1A compensates for promoter 1B's dysfunction in the colonic mucosa, likely sparing the colorectum of polyposis. However, promoter 1A is methylated in the gastric mucosa, resulting in isolated gastric polyposis.[10] Nevertheless, GAPPS is caused by pathogenic variants in the same gene (APC) that causes familial adenomatous polyposis and can therefore, theoretically increase risk of colonic neoplasia.

Clinicopathologic evaluation of two families with GAPPS phenotypes (based on clinical criteria) demonstrated that seven of nine affected individuals had colon pathology.[9] In contrast, the six first-degree relatives (FDRs) in the study without GAPPS diagnoses had normal colonoscopies. In this study, the average age of individuals with GAPPS was 43.9 years (range, 20–71 y), whereas the average age of FDRs without GAPPS was 32.2 years (range, 18–51 y). In the GAPPS group, four of nine individuals had tubular adenomas in the colon, the youngest of whom was 48 years old. The colorectal polyps in individuals with GAPPS had increased beta-catenin, Ki67, and p53 expression. This expression pattern was also noted in the fundic gland polyps of these individuals, suggesting that GAPPS may be responsible. In the first paper that described GAPPS, 13 individuals with GAPPS underwent colonoscopy, in which six individuals (age, 18–37 y) did not have polyps, three individuals (age, 31–56 y) had tubular adenomas (including a 46-year-old individual who developed eight tubular adenomas over 4 years), and four individuals had hyperplastic polyps (one was located in the proximal colon, and the rest were located in the rectosigmoid colon).[7] Notably, none of the individuals had colonic polyposis. Colonoscopy findings were available for eight family members who did not have GAPPS. Three of these individuals (age, 55–77 y) had a single tubular adenoma with or without villous features. The other five individuals were less than 45 years old (age, 29–36 y) and had normal colonoscopies. In contrast to these studies, a report from eight French families with an APC pathogenic variant in promoter 1B revealed colonic polyposis in multiple members, which required colectomy.[10,11] When these data are taken together, it is unclear whether individuals with GAPPS develop colonic neoplasia any earlier than individuals in the general population. However, there appears to be a trend in which individuals with GAPPS develop more polyps than individuals in the general population.

### References

Huang CZ, Lai RX, Mai L, et al.: Relative risk factors associated with the development of fundic gland polyps. Eur J Gastroenterol Hepatol 26 (11): 1217-21, 2014.25187299
Repak R, Kohoutova D, Podhola M, et al.: The first European family with gastric adenocarcinoma and proximal polyposis of the stomach: case report and review of the literature. Gastrointest Endosc 84 (4): 718-25, 2016.27343414
Mitsui Y, Yokoyama R, Fujimoto S, et al.: First report of an Asian family with gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS) revealed with the germline mutation of the APC exon 1B promoter region. Gastric Cancer 21 (6): 1058-1063, 2018.29968043
Beer A, Streubel B, Asari R, et al.: Gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS) - a rare recently described gastric polyposis syndrome - report of a case. Z Gastroenterol 55 (11): 1131-1134, 2017.29141268
Foretová L, Navrátilová M, Svoboda M, et al.: GAPPS - Gastric Adenocarcinoma and Proximal Polyposis of the Stomach Syndrome in 8 Families Tested at Masaryk Memorial Cancer Institute - Prevention and Prophylactic Gastrectomies. Klin Onkol 32 (Supplementum2): 109-117, 2019.31409086
de Boer WB, Ee H, Kumarasinghe MP: Neoplastic Lesions of Gastric Adenocarcinoma and Proximal Polyposis Syndrome (GAPPS) Are Gastric Phenotype. Am J Surg Pathol 42 (1): 1-8, 2018.29112017
Worthley DL, Phillips KD, Wayte N, et al.: Gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS): a new autosomal dominant syndrome. Gut 61 (5): 774-9, 2012.21813476
Grossman A, Colavito J, Levine J, et al.: Filling in the "GAPPS": an unusual presentation of a child with gastric adenocarcinoma and proximal polyposis of the stomach. Gastric Cancer 25 (2): 468-472, 2022.34581903
McDuffie LA, Sabesan A, Allgäeuer M, et al.: β-Catenin activation in fundic gland polyps, gastric cancer and colonic polyps in families afflicted by 'gastric adenocarcinoma and proximal polyposis of the stomach' (GAPPS). J Clin Pathol 69 (9): 826-33, 2016.27406052
Li J, Woods SL, Healey S, et al.: Point Mutations in Exon 1B of APC Reveal Gastric Adenocarcinoma and Proximal Polyposis of the Stomach as a Familial Adenomatous Polyposis Variant. Am J Hum Genet 98 (5): 830-842, 2016.27087319
Lagarde A, Rouleau E, Ferrari A, et al.: Germline APC mutation spectrum derived from 863 genomic variations identified through a 15-year medical genetics service to French patients with FAP. J Med Genet 47 (10): 721-2, 2010.20685668

## Management for GAPPS

Consensus guidelines for management of gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS) do not exist, given the rarity of this syndrome and the dearth of GAPPS literature (aside from case reports or case series). Furthermore, the incomplete penetrance of GAPPS and its large age range of polyposis onset/gastric adenocarcinoma incidence makes creating uniform management recommendations challenging. The literature frequently recommends that providers use an individualized management approach for patients with GAPPS, with frequent upper endoscopic surveillance and extensive sampling of gastric polyps.[1] The literature also suggests discussing gastrectomy planning early with a multidisciplinary team.

The goal of gastric endoscopic surveillance is to detect morphological or histological changes that increase risk for gastric adenocarcinoma. Generally, the detection of fundic gland dysplasia in GAPPS prompts heightened gastric cancer surveillance with more frequent endoscopic screening and discussions about risk-reducing gastrectomy with a multidisciplinary team. However, the natural progression in histology from fundic gland polyp to adenocarcinoma (including the precursor lesion to adenocarcinoma) is unknown. It has been hypothesized that hyperproliferative crypts found on pathology may be precursors to fundic gland polyps and adenomas in patients with GAPPS.[2] In addition to understanding the histological precursors of gastric adenocarcinoma, endoscopically identifying them is challenging, since they may easily be hidden or missed in the setting of dense polyp carpeting. For example, in a study, four members of a European family had GAPPS and developed gastric adenocarcinoma while under endoscopic surveillance.[3] In two of these individuals, gastric adenocarcinoma was identified in their gastrectomy specimens.

Given the variable penetrance of GAPPS, the correlation between gastric adenocarcinoma and clinical features (such as age, family history, degree of polyposis, and pathology of polyps) is unknown. However, given the high incidence of gastric adenocarcinoma seen in those with GAPPS (even when patients participate in gastric surveillance), discussion about risk-reducing gastrectomy with a multidisciplinary team may be warranted. Risk-reducing gastrectomy has been recommended when dysplasia is present.[1,4,5]

There are no consensus guidelines for colorectal surveillance in patients with GAPPS. Therefore, patients are managed based on their family histories of colorectal polyps/cancer with consideration of a baseline colonoscopy to exclude colonic polyposis.[6]

Level of evidence: 5

### References

Rudloff U: Gastric adenocarcinoma and proximal polyposis of the stomach: diagnosis and clinical perspectives. Clin Exp Gastroenterol 11: 447-459, 2018.30584346
de Boer WB, Ee H, Kumarasinghe MP: Neoplastic Lesions of Gastric Adenocarcinoma and Proximal Polyposis Syndrome (GAPPS) Are Gastric Phenotype. Am J Surg Pathol 42 (1): 1-8, 2018.29112017
Repak R, Kohoutova D, Podhola M, et al.: The first European family with gastric adenocarcinoma and proximal polyposis of the stomach: case report and review of the literature. Gastrointest Endosc 84 (4): 718-25, 2016.27343414
Tacheci I, Repak R, Podhola M, et al.: Gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS) - A Helicobacter-opposite point. Best Pract Res Clin Gastroenterol 50-51: 101728, 2021.33975682
Matsumoto C, Iwatsuki M, Iwagami S, et al.: Prophylactic laparoscopic total gastrectomy for gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS): the first report in Asia. Gastric Cancer 25 (2): 473-478, 2022.34554346
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Colorectal. Version 2.2023 . Plymouth Meeting, PA: National Comprehensive Cancer Network, 2023. Available with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_colon.pdf) Last accessed March 13, 2024.

## Latest Updates to This Summary (01/03/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of gastric adenocarcinoma and proximal polyposis of the stomach. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Gastric Adenocarcinoma and Proximal Polyposis of the Stomach (GAPPS) are:

- Grace-Ann O. Fasaye, ScM, CGC (National Cancer Institute)
- Gautam Mankaney, MD (Virginia Mason Franciscan Health)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board. PDQ Gastric Adenocarcinoma and Proximal Polyposis of the Stomach (GAPPS). Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/information-summaries/genetics/gapps-hp-pdq . Accessed <MM/DD/YYYY>. [PMID: 38630970]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).